# Liver (Hepatocellular) Cancer Prevention

Patient Version

This PDQ cancer information summary has current information about liver (hepatocellular) cancer prevention. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Date Last Modified") is the date of the most recent change. The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Screening and Prevention Editorial Board.

## What Is Liver Cancer?

Primary liver cancer is a disease in which malignant (cancer) cells form in the tissues of the liver. Cancer that forms in other parts of the body and spreads to the liver is not primary liver cancer. The liver is one of the largest organs in the body. It has two lobes and fills the upper right side of the abdomen inside the rib cage. The main functions of the liver include the following:

- to make bile to help digest fat that comes from food
- to store glycogen (sugar), which the body uses for energy
- to filter harmful substances from the blood so they can be passed from the body in stools and urine

Anatomy of the liver. The liver is in the upper abdomen near the stomach, intestines, gallbladder, and pancreas. The liver has a right lobe and a left lobe. Each lobe is divided into two sections (not shown).

Anatomy of the liver; drawing shows the right and left lobes of the liver. Also shown are the bile ducts, gallbladder, stomach, spleen, pancreas, small intestine, and colon.

### Types of liver cancer

Hepatocellular carcinoma and bile duct cancer (cholangiocarcinoma) (https://www.cancer.gov/types/liver/bile-duct-cancer/treatment) are the main types of adult primary liver cancer.

Most adult primary liver cancers are hepatocellular carcinomas. This type of liver cancer is the third leading cause of cancer-related deaths worldwide.

Primary liver cancer can occur in both adults and children. However, treatment for children is different than treatment for adults. For more information, see Childhood Liver Cancer (https://www.cancer.gov/types/liver/childhood-liver-cancer).

### Signs and symptoms of liver cancer

These and other signs and symptoms may be caused by adult primary liver cancer or by other conditions. Check with your doctor if you have any of the following:

- a hard lump on the right side just below the rib cage
- discomfort in the upper abdomen on the right side
- a swollen abdomen
- pain near the right shoulder blade or in the back
- jaundice (yellowing of the skin and whites of the eyes)
- easy bruising or bleeding
- unusual tiredness or weakness
- nausea and vomiting
- loss of appetite or feelings of fullness after eating a small meal
- weight loss for no known reason
- pale, chalky bowel movements and dark urine
- fever

## Liver Cancer Causes, Risk Factors, and Prevention

Worldwide, liver cancer is the sixth most common cancer and the third leading cause of cancer death. In the United States, rates are highest in American Indian or Alaska Native individuals. Liver cancer is the sixth leading cause of cancer deaths in the United States.

### Liver cancer causes and risk factors

The most common type of liver cancer in adults, hepatocellular carcinoma (HCC), typically develops in people with chronic (long-lasting) liver disease caused by hepatitis virus infection or cirrhosis. Men are more likely to develop HCC than women. People with multiple risk factors have an even higher risk.

Many risk factors have been associated with liver cancer. Not everyone with one or more of these risk factors will develop the disease, and the disease will develop in some people who don’t have any known risk factors. Risk factors include the following:

- Hepatitis B virus (HBV) infection: HBV can be transmitted in blood, semen, or other body fluids. The infection can be passed from mother to child during childbirth, through sexual contact, or by sharing needles that are used to inject drugs. It can cause inflammation (swelling) of the liver that leads to cancer. Routine HBV vaccination in infancy is reducing the incidence of HBV infection. Chronic HBV infection is the leading cause of liver cancer in Asia and Africa.
- Hepatitis C virus (HCV) infection: HCV can be transmitted in the blood. The infection can be spread by sharing needles that are used to inject drugs or, less often, through sexual contact. In the past, it was also spread during blood transfusions or organ transplants. Today, blood banks test all donated blood for HCV, which greatly lowers the risk of getting the virus from blood transfusions. It can cause cirrhosis that may lead to liver cancer. Chronic HCV infection is the leading cause of liver cancer in North America, Europe, and Japan.
- Cirrhosis: The risk of developing liver cancer is increased for people who have cirrhosis, a disease in which healthy liver tissue is replaced by scar tissue. The scar tissue blocks the flow of blood through the liver and keeps it from working as it should. Chronic alcoholism and chronic hepatitis infections are common causes of cirrhosis. People with HCV-related cirrhosis have a higher risk of developing liver cancer than people with cirrhosis related to HBV or alcohol use.
- Heavy alcohol use: Heavy alcohol use can cause cirrhosis, which is a risk factor for liver cancer. Liver cancer can also occur in heavy alcohol users who do not have cirrhosis. Heavy alcohol users who have cirrhosis are ten times more likely to develop liver cancer, compared with heavy alcohol users who do not have cirrhosis.
  Studies have shown there is also an increased risk of liver cancer in people with HBV or HCV infection who use alcohol heavily.
- Aflatoxin B1: The risk of developing liver cancer may be increased by eating foods that contain aflatoxin B1 (poison from a fungus that can grow on foods, such as corn and nuts, that have been stored in hot, humid places). It is most common in sub-Saharan Africa, Southeast Asia, and China.
- Nonalcoholic steatohepatitis (NASH): NASH is a condition that can cause cirrhosis that may lead to liver cancer. It is the most severe form of nonalcoholic fatty liver disease, where there is an abnormal amount of fat in the liver. In some people, this can cause inflammation and injury to the cells of the liver.
  Having NASH-related cirrhosis increases the risk of developing liver cancer. Liver cancer has also been found in people with NASH who do not have cirrhosis.
- Cigarette smoking: Cigarette smoking has been linked to a higher risk of liver cancer. The risk increases with the number of cigarettes smoked per day and the number of years the person has smoked.
- Other conditions: Certain rare medical and genetic conditions may increase the risk of liver cancer. These conditions include the following:
  - untreated hereditary hemochromatosis
  - alpha-1 antitrypsin deficiency
  - glycogen storage disease
  - porphyria cutanea tarda
  - Wilson disease

### Liver cancer prevention

Cancer prevention is action taken to lower the chance of getting cancer. By preventing cancer, the number of new cases of cancer in a group or population is lowered. Hopefully, this will lower the number of deaths caused by cancer.

Anything that increases your chance of getting cancer is called a risk factor. Anything that lowers your chance of getting cancer is called a cancer protective factor. Prevention includes avoiding risk factors and increasing protective factors.

The following are protective factors for liver cancer:

- Getting the hepatitis B vaccine: Preventing HBV infection (by being vaccinated for HBV as a newborn) has been shown to lower the risk of liver cancer in children. It is not yet known if being vaccinated lowers the risk of liver cancer in adults.
- Getting treatment for chronic hepatitis B infection: Treatment options for people with chronic HBV infection include interferon and nucleos(t)ide analog therapy. These treatments may reduce the risk of developing liver cancer.
- Reducing exposure to aflatoxin B1: Replacing foods that contain high amounts of aflatoxin B1 with foods that contain a much lower level of the poison can reduce the risk of liver cancer.